# Myelodysplastic/ Myeloproliferative Neoplasms Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of myelodysplastic/ myeloproliferative neoplasms. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board.

## General Information About Myelodysplastic/ Myeloproliferative Neoplasms

Key Points for This Section
- Myelodysplastic/myeloproliferative neoplasms are a group of diseases in which the bone marrow makes too many white blood cells.
- Myelodysplastic/myeloproliferative neoplasms have features of both myelodysplastic syndromes and myeloproliferative neoplasms.
- There are two main types of myelodysplastic/myeloproliferative neoplasms.
- Tests that examine the blood and bone marrow are used to diagnose myelodysplastic/myeloproliferative neoplasms.

### Myelodysplastic/myeloproliferative neoplasms are a group of diseases in which the bone marrow makes too many white blood cells.

Myelodysplastic/myeloproliferative neoplasms are diseases of the blood and bone marrow.

Anatomy of the bone. The bone is made up of compact bone, spongy bone, and bone marrow. Compact bone makes up the outer layer of the bone. Spongy bone is found mostly at the ends of bones and contains red marrow. Bone marrow is found in the center of most bones and has many blood vessels. There are two types of bone marrow: red and yellow. Red marrow contains blood stem cells that can become red blood cells, white blood cells, or platelets. Yellow marrow is made mostly of fat.

Anatomy of the bone; drawing shows spongy bone, red marrow, and yellow marrow. A cross section of the bone shows compact bone and blood vessels in the bone marrow. Also shown are red blood cells, white blood cells, platelets, and a blood stem cell.

Normally, the bone marrow makes blood stem cells (immature cells) that become mature blood cells over time. A blood stem cell may become a myeloid stem cell or a lymphoid stem cell. A lymphoid stem cell becomes a white blood cell. A myeloid stem cell becomes one of three types of mature blood cells:

- red blood cells that carry oxygen and other substances to all tissues of the body
- granulocytes and other types of white blood cells that help the body's immune system respond to infection, allergens, and inflammation
- platelets that help stop bleeding by forming clots

Blood cell development. A blood stem cell goes through several steps to become a red blood cell, platelet, or white blood cell.

Blood cell development; drawing shows the steps a blood stem cell goes through to become a red blood cell, platelet, or white blood cell. Drawing shows a myeloid stem cell becoming a red blood cell, platelet, or myeloblast, which then becomes a white blood cell. Drawing also shows a lymphoid stem cell becoming a lymphoblast and then one of several different types of white blood cells.

### Myelodysplastic/myeloproliferative neoplasms have features of both myelodysplastic syndromes and myeloproliferative neoplasms.

In myelodysplastic diseases, the blood stem cells do not mature into healthy red blood cells, white blood cells, or platelets. The immature blood cells, called blasts, do not work the way they should and die in the bone marrow or soon after they enter the blood. As a result, there are fewer healthy red blood cells, white blood cells, and platelets.

In myeloproliferative diseases, a greater than normal number of blood stem cells become one or more types of blood cells and the total number of blood cells slowly increases.

This summary is about neoplasms that have features of both myelodysplastic and myeloproliferative diseases. For more information about related diseases, see:

- Myelodysplastic Syndromes Treatment
- Myeloproliferative Neoplasms Treatment
- Chronic Myeloid Leukemia Treatment

### There are two main types of myelodysplastic/myeloproliferative neoplasms.

The two main types of myelodysplastic/myeloproliferative neoplasms in adults include:

- chronic myelomonocytic leukemia (CMML)
- atypical chronic myeloid leukemia (CML)

When a myelodysplastic/myeloproliferative neoplasm does not match any of these types, it is called myelodysplastic/myeloproliferative neoplasm, unclassifiable (MDS/MPN-UC).

Myelodysplastic/myeloproliferative neoplasms may progress to acute leukemia.

### Tests that examine the blood and bone marrow are used to diagnose myelodysplastic/myeloproliferative neoplasms.

In addition to asking about your personal and family health history and doing a physical exam, your doctor may perform the following tests and procedures:

- Complete blood count (CBC) with differential: A procedure in which a sample of blood is drawn and checked for:
  - the number of red blood cells and platelets
  - the number and type of white blood cells
  - the amount of hemoglobin (the protein that carries oxygen) in the red blood cells
  - the portion of the sample made up of red blood cells
  Complete blood count (CBC). Blood is collected by inserting a needle into a vein and allowing the blood to flow into a tube. The blood sample is sent to the laboratory and the red blood cells, white blood cells, and platelets are counted. The CBC is used to test for, diagnose, and monitor many different conditions.
  Complete blood count (CBC); left panel shows blood being drawn from a vein on the inside of the elbow using a tube attached to a syringe; right panel shows a laboratory test tube with blood cells separated into layers: plasma, white blood cells, platelets, and red blood cells.
- Peripheral blood smear: A procedure in which a sample of blood is checked for blast cells, the number and kinds of white blood cells, the number of platelets, and changes in the shape of blood cells.
- Blood chemistry studies: A procedure in which a blood sample is checked to measure the amounts of certain substances released into the blood by organs and tissues in the body. An unusual (higher or lower than normal) amount of a substance can be a sign of disease.
- Bone marrow aspiration and biopsy: The removal of a small piece of bone and bone marrow by inserting a needle into the hipbone or breastbone. A pathologist views both the bone and bone marrow samples under a microscope to look for abnormal cells.
  Bone marrow aspiration and biopsy. After a small area of skin is numbed, a long, hollow needle is inserted through the patient's skin and hip bone into the bone marrow. A sample of bone marrow and a small piece of bone are removed for examination under a microscope.
  Bone marrow aspiration and biopsy; drawing shows a patient lying face down on a table and a bone marrow needle being inserted into the hip bone. An inset shows a close up of the needle being inserted through the skin and hip bone into the bone marrow.
  The following tests may be done on the sample of tissue that is removed:
  - Cytogenetic analysis: A laboratory test in which the chromosomes of cells in a sample of bone marrow or blood are counted and checked for any changes, such as broken, missing, rearranged, or extra chromosomes. Changes in certain chromosomes may be a sign of cancer. Cytogenetic analysis is used to help diagnose cancer, plan treatment, or find out how well treatment is working. The cancer cells in myelodysplastic/myeloproliferative neoplasms do not contain the Philadelphia chromosome that is present in chronic myeloid leukemia.
  - Immunocytochemistry: A laboratory test that uses antibodies to check for certain antigens (markers) in a sample of a patient's bone marrow. The antibodies are usually linked to an enzyme or a fluorescent dye. After the antibodies bind to the antigen in the sample of the patient's bone marrow, the enzyme or dye is activated, and the antigen can then be seen under a microscope. This type of test is used to help diagnose cancer and to tell the difference between myelodysplastic/myeloproliferative neoplasms, leukemia, and other conditions.

## Chronic Myelomonocytic Leukemia

Key Points for This Section
- Chronic myelomonocytic leukemia is a disease in which too many myelocytes and monocytes (immature white blood cells) are made in the bone marrow.
- Older age and being male increase the risk of chronic myelomonocytic leukemia.
- Signs and symptoms of chronic myelomonocytic leukemia include fever, weight loss, and feeling very tired.
- Certain factors affect prognosis (chance of recovery) and treatment options.

### Chronic myelomonocytic leukemia is a disease in which too many myelocytes and monocytes (immature white blood cells) are made in the bone marrow.

In chronic myelomonocytic leukemia (CMML), the body tells too many blood stem cells to become two types of white blood cells called myelocytes and monocytes. Some of these blood stem cells never become mature white blood cells. These immature white blood cells are called blasts. Over time, the myelocytes, monocytes, and blasts crowd out the red blood cells and platelets in the bone marrow. When this happens, infection, anemia, or easy bleeding may occur.

### Older age and being male increase the risk of chronic myelomonocytic leukemia.

Anything that increases a person's chance of getting a disease is called a risk factor. Not every person with one or more of these risk factors will develop CMML, and it will develop in some people who don't have any known risk factors. Talk with your doctor if you think you may be at risk. Risk factors for CMML include:

- older age
- being male
- being exposed to certain substances at work or in the environment
- being exposed to radiation
- past treatment with certain anticancer drugs

### Signs and symptoms of chronic myelomonocytic leukemia include fever, weight loss, and feeling very tired.

These and other signs and symptoms may be caused by CMML or by other conditions. Check with your doctor if you have:

- fever for no known reason
- infection
- tiredness
- weight loss for no known reason
- easy bruising or bleeding
- pain or a feeling of fullness below the ribs

### Certain factors affect prognosis (chance of recovery) and treatment options.

The prognosis and treatment options for CMML depend on:

- the number of white blood cells or platelets in the blood or bone marrow
- whether the patient is anemic
- the amount of blasts in the blood or bone marrow
- the amount of hemoglobin in red blood cells
- whether there are certain changes in the chromosomes

## Atypical Chronic Myeloid Leukemia

Key Points for This Section
- Atypical chronic myeloid leukemia is a disease in which too many granulocytes (immature white blood cells) are made in the bone marrow.
- Signs and symptoms of atypical chronic myeloid leukemia include easy bruising or bleeding and feeling tired and weak.
- Certain factors affect prognosis (chance of recovery).

### Atypical chronic myeloid leukemia is a disease in which too many granulocytes (immature white blood cells) are made in the bone marrow.

In atypical chronic myeloid leukemia (CML), the body tells too many blood stem cells to become a type of white blood cell called granulocytes. Some of these blood stem cells never become mature white blood cells. These immature white blood cells are called blasts. Over time, the granulocytes and blasts crowd out the red blood cells and platelets in the bone marrow.

The leukemia cells in atypical CML and CML look alike under a microscope. However, in atypical CML a certain chromosome change, called the "Philadelphia chromosome," is not there.

### Signs and symptoms of atypical chronic myeloid leukemia include easy bruising or bleeding and feeling tired and weak.

These and other signs and symptoms may be caused by atypical CML or by other conditions. Check with your doctor if you have:

- shortness of breath
- pale skin
- tiredness and weakness
- easy bruising or bleeding
- petechiae (flat, pinpoint spots under the skin caused by bleeding)
- pain or a feeling of fullness below the ribs on the left side

### Certain factors affect prognosis (chance of recovery).

The prognosis for atypical CML depends on the number of red blood cells and platelets in the blood.

## Myelodysplastic/ Myeloproliferative Neoplasm, Unclassifiable

Key Points for This Section
- Myelodysplastic/myeloproliferative neoplasm, unclassifiable, is a disease that has features of both myelodysplastic and myeloproliferative diseases but is not chronic myelomonocytic leukemia or atypical chronic myeloid leukemia.
- Signs and symptoms of myelodysplastic/myeloproliferative neoplasm, unclassifiable, include fever, weight loss, and feeling very tired.

### Myelodysplastic/myeloproliferative neoplasm, unclassifiable, is a disease that has features of both myelodysplastic and myeloproliferative diseases but is not chronic myelomonocytic leukemia or atypical chronic myeloid leukemia.

In myelodysplastic/myeloproliferative neoplasm, unclassifiable (MDS/MPD-UC), the body tells too many blood stem cells to become red blood cells, white blood cells, or platelets. Some of these blood stem cells never become mature blood cells. These immature blood cells are called blasts. Over time, the abnormal blood cells and blasts in the bone marrow crowd out the healthy red blood cells, white blood cells, and platelets.

MDS/MPN-UC is a very rare disease. Because it is so rare, the factors that affect risk and prognosis are not known.

### Signs and symptoms of myelodysplastic/myeloproliferative neoplasm, unclassifiable, include fever, weight loss, and feeling very tired.

These and other signs and symptoms may be caused by MDS/MPN-UC or by other conditions. Check with your doctor if you have:

- fever or frequent infections
- shortness of breath
- tiredness and weakness
- pale skin
- easy bruising or bleeding
- petechiae (flat, pinpoint spots under the skin caused by bleeding)
- pain or a feeling of fullness below the ribs

## Stages of Myelodysplastic/ Myeloproliferative Neoplasms

Key Points for This Section
- There is no standard staging system for myelodysplastic/myeloproliferative neoplasms.

### There is no standard staging system for myelodysplastic/myeloproliferative neoplasms.

The process used to find out if cancer has spread is called staging. There is no standard staging system for myelodysplastic/myeloproliferative neoplasms. It is important to know the type of myelodysplastic/myeloproliferative neoplasm in order to plan treatment.

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for patients with myelodysplastic/myeloproliferative neoplasms.
- The following types of treatment are used:
  - Watchful waiting
  - Chemotherapy
  - Other drug therapy
  - Stem cell transplant
  - Supportive care
  - Targeted therapy
- New types of treatment are being tested in clinical trials.
- Treatment for myelodysplastic/myeloproliferative neoplasms may cause side effects.
- Follow-up care may be needed.

### There are different types of treatment for patients with myelodysplastic/myeloproliferative neoplasms.

Different types of treatments are available for patients with myelodysplastic/myeloproliferative neoplasms. Some treatments are standard (the currently used treatment), and some are being tested in clinical trials. A treatment clinical trial is a research study meant to help improve current treatments or obtain information on new treatments for patients with cancer. When clinical trials show that a new treatment is better than the standard treatment, the new treatment may become the standard treatment. Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

### The following types of treatment are used:

#### Watchful waiting

Watchful waiting is closely monitoring a patient's condition without giving any treatment until signs or symptoms appear or change. It is sometimes used to treat chronic myelomonocytic leukemia in patients with no or mild symptoms.

#### Chemotherapy

Chemotherapy is a cancer treatment that uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. When chemotherapy is taken by mouth or injected into a vein or muscle, the drugs enter the bloodstream and can reach cancer cells throughout the body (systemic chemotherapy). Combination chemotherapy is treatment using more than one anticancer drug.

For more information, see Drugs Approved for Myeloproliferative Neoplasms or Myelodysplastic Syndromes (https://www.cancer.gov/about-cancer/treatment/drugs/myeloproliferative-neoplasms).

#### Other drug therapy

13-cis retinoic acid is a vitamin-like drug that slows the cancer's ability to make more cancer cells and changes the way these cells look and act.

#### Stem cell transplant

Chemotherapy is given to kill abnormal cells or cancer cells. Healthy cells, including blood-forming cells, are also destroyed by the cancer treatment. Stem cell transplant is a treatment to replace the blood-forming cells. Stem cells (immature blood cells) are removed from the blood or bone marrow of the patient or a donor and are frozen and stored. After the patient completes chemotherapy, the stored stem cells are thawed and given back to the patient through an infusion. These reinfused stem cells grow into (and restore) the body's blood cells.

Donor stem cell transplant. (Step 1): Four to five days before donor stem cell collection, the donor receives a medicine to increase the number of stem cells circulating through their bloodstream (not shown). The blood-forming stem cells are then collected from the donor through a large vein in their arm. The blood flows through an apheresis machine that removes the stem cells. The rest of the blood is returned to the donor through a vein in their other arm. (Step 2): The patient receives chemotherapy to kill cancer cells and prepare their body for the donor stem cells. The patient may also receive radiation therapy (not shown). (Step 3): The patient receives an infusion of the donor stem cells.

Donor stem cell transplant; (Panel 1): Drawing of stem cells being collected from a donor's bloodstream using an apheresis machine. Blood is removed from a vein in the donor's arm and flows through the machine where the stem cells are removed. The rest of the blood is then returned to the donor through a vein in their other arm. (Panel 2): Drawing of a health care provider giving a patient an infusion of chemotherapy through a catheter in the patient's chest. The chemotherapy is given to kill cancer cells and prepare the patient's body for the donor stem cells. (Panel 3): Drawing of a patient receiving an infusion of the donor stem cells through a catheter in the chest.

#### Supportive care

Supportive care is given to lessen the problems caused by the disease or its treatment. Supportive care may include transfusion therapy or drug therapy, such as antibiotics to fight infection.

#### Targeted therapy

Targeted therapy is a type of treatment that uses drugs or other substances to identify and attack specific cancer cells.

- Tyrosine kinase inhibitor (TKI) therapy: TKI therapy blocks signals that tumors need to grow. TKIs block the enzyme tyrosine kinase that causes stem cells to become more blood cells (blasts) than the body needs. Imatinib mesylate (Gleevec) is used to treat myelodysplastic/myeloproliferative neoplasm, unclassifiable.

For more information, see Drugs Approved for Myeloproliferative Neoplasms or Myelodysplastic Syndromes (https://www.cancer.gov/about-cancer/treatment/drugs/myeloproliferative-neoplasms).

### New types of treatment are being tested in clinical trials.

For some people, joining a clinical trial may be an option. There are different types of clinical trials for people with cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment for myelodysplastic/myeloproliferative neoplasms may cause side effects.

For information about side effects caused by treatment for cancer, visit our Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects) page.

### Follow-up care may be needed.

As you go through treatment, you will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your condition has changed or if the cancer has recurred (come back).

## Treatment of Chronic Myelomonocytic Leukemia

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of chronic myelomonocytic leukemia (CMML) may include:

- watchful waiting
- chemotherapy with one or more agents
- stem cell transplant

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Atypical Chronic Myeloid Leukemia

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of atypical chronic myeloid leukemia (CML) may include chemotherapy.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Myelodysplastic/ Myeloproliferative Neoplasm, Unclassifiable

For information about the treatments listed below, see the Treatment Option Overview section.

Because myelodysplastic/myeloproliferative neoplasm, unclassifiable (MDS/MPN-UC) is a rare disease, little is known about its treatment. Treatment may include:

- supportive care treatments to manage problems caused by the disease such as infection, bleeding, and anemia
- targeted therapy (imatinib mesylate)

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More About Myelodysplastic/ Myeloproliferative Neoplasms

For more information from the National Cancer Institute about myelodysplastic/myeloproliferative neoplasms, visit:

- Myeloproliferative Neoplasms Home Page (https://www.cancer.gov/types/myeloproliferative)
- Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)
- Drugs Approved for Myeloproliferative Neoplasms or Myelodysplastic Syndromes (https://www.cancer.gov/about-cancer/treatment/drugs/myeloproliferative-neoplasms)
- Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies)

For general cancer information and other resources from the National Cancer Institute, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you)
- Radiation Therapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/radiation-therapy-and-you)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of myelodysplastic/ myeloproliferative neoplasms. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Myelodysplastic/ Myeloproliferative Neoplasms Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/myeloproliferative/patient/mds-mpd-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389360]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).